# Skin Cancer Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about skin cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What is prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied.

## General Information About Skin Cancer

Key Points for This Section
- Skin cancer is a disease in which malignant (cancer) cells form in the tissues of the skin.
- There are several types of skin cancer.
- Skin cancer is the most common cancer in the United States.

### Skin cancer is a disease in which malignant (cancer) cells form in the tissues of the skin.

The skin is the body’s largest organ. It protects against heat, sunlight, injury, and infection. Skin also helps control body temperature and stores water, fat, and vitamin D. The skin has several layers, but the two main layers are the epidermis (upper or outer layer) and the dermis (lower or inner layer).

The epidermis is made up of three kinds of cells:

- Squamous cells are the thin, flat cells that make up most of the epidermis.
- Basal cells are the round cells under the squamous cells.
- Melanocytes are found throughout the lower part of the epidermis. They make melanin, the pigment that gives skin its natural color. When skin is exposed to the sun, melanocytes make more pigment, causing the skin to tan, or darken.

The dermis contains blood and lymph vessels, hair follicles, and glands.

Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue. Melanocytes are in the layer of basal cells at the deepest part of the epidermis.

Anatomy of the skin with melanocytes; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis above the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.

For more information about skin cancer, see the following:

- Skin Cancer Screening
- Skin Cancer Treatment
- Melanoma Treatment
- Genetics of Skin Cancer

### There are several types of skin cancer.

There are two main types of skin cancer:

- Nonmelanoma or keratinocyte carcinoma, which includes:
  - Squamous cell carcinoma (SCC).
  - Basal cell carcinoma.
- Melanoma.

The most common types of skin cancer are squamous cell carcinoma, which forms in the squamous cells, and basal cell carcinoma, which forms in the basal cells. Squamous cell carcinoma and basal cell carcinoma are also called keratinocyte carcinoma or nonmelanoma skin cancers. Melanoma, which forms in the melanocytes, is a less common type of skin cancer that grows and spreads quickly.

Skin cancer can occur anywhere on the body, but it is most common in areas exposed to sunlight, such as the face, neck, hands, and arms.

### Skin cancer is the most common cancer in the United States.

Basal cell carcinoma and squamous cell carcinoma are the most common types of skin cancer in the United States. The number of new cases of nonmelanoma skin cancer appears to be increasing every year. These nonmelanoma skin cancers can usually be cured.

The number of new cases of melanoma has been increasing for at least 40 years. Melanoma is more likely to spread to nearby tissues and other parts of the body and can be harder to cure. Finding and treating melanoma skin cancer early may help prevent death from melanoma.

## Skin Cancer Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- Being exposed to ultraviolet radiation is a risk factor for skin cancer.
- Treatment of sun-damaged skin to prevent skin cancer:
- It is not known if the following lower the risk of nonmelanoma skin cancer:
  - Sunscreen use and avoiding sun exposure
  - Chemopreventive agents
- It is not known if the following lower the risk of melanoma:
  - Sunscreen
  - Counseling and protecting the skin from the sun
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent skin cancer are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

### Being exposed to ultraviolet radiation is a risk factor for skin cancer.

Some studies suggest that being exposed to ultraviolet (UV) radiation and the sensitivity of a person’s skin to UV radiation are risk factors for skin cancer. UV radiation is the name for the invisible rays that are part of the energy that comes from the sun. Sunlamps and tanning beds also give off UV radiation.

Risk factors for nonmelanoma and melanoma cancers are not the same.

- Risk factors for nonmelanoma skin cancer:
  - Being exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time.
  - Having a fair complexion, which includes the following:
    - Fair skin that freckles and burns easily, does not tan, or tans poorly.
    - Blue or green or other light-colored eyes.
    - Red or blond hair.
  - Having actinic keratosis.
  - Past treatment with radiation.
  - Having a weakened immune system, including people treated with immunosuppressive therapy after organ transplant.
  - Being exposed to arsenic.
- Risk factors for melanoma skin cancer:
  - Having a fair complexion, which includes the following:
    - Fair skin that freckles and burns easily, does not tan, or tans poorly.
    - Blue or green or other light-colored eyes.
    - Red or blond hair.
  - Being exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time.
  - Having a history of many blistering sunburns, especially as a child or teenager.
  - Having many moles (also called nevi).
  - Having a family history of unusual moles (atypical nevus syndrome).
  - Having a family or personal history of melanoma.
  - Being White.

Although having a fair complexion is a risk factor for nonmelanoma and melanoma skin cancer, people of all skin colors can get skin cancer.

### Treatment of sun-damaged skin to prevent skin cancer:

#### Topical fluorouracil

A study showed that topical fluorouracil applied on sun-damaged skin daily for up to 4 weeks prevented new actinic keratoses from developing. The areas treated with topical fluorouracil had a lowered risk of developing into squamous cell carcinoma that would require surgery. The lowered risk of developing into squamous cell carcinoma was seen for 1 year after treatment. Topical fluorouracil did not, however, change the risk of developing basal cell carcinoma.

### It is not known if the following lower the risk of nonmelanoma skin cancer:

#### Sunscreen use and avoiding sun exposure

It is not known if nonmelanoma skin cancer risk is decreased by staying out of the sun, using sunscreens, or wearing protective clothing when outdoors. This is because not enough studies have been done to prove this.

Sunscreen has been shown to prevent sunburns and actinic keratoses that may become squamous cell carcinoma, and to decrease the signs and symptoms of existing actinic keratoses.

The harms of using sunscreen are likely to be small and include allergic reactions to skin creams and lower levels of vitamin D made in the skin because of less sun exposure.

It is also possible that when a person uses sunscreen to avoid sunburn they may spend too much time in the sun and be exposed to harmful UV radiation.

Although protecting the skin and eyes from the sun has not been proven to lower the chance of getting skin cancer, skin experts suggest the following:

- Use sunscreen that protects against UV radiation.
- Do not stay out in the sun for long periods of time, especially when the sun is at its strongest.
- Wear long sleeve shirts, long pants, sun hats, and sunglasses, when outdoors.

#### Chemopreventive agents

Chemoprevention is the use of drugs, vitamins, or other agents to try to reduce the risk of cancer. The following chemopreventive agents have been studied to find whether they lower the risk of nonmelanoma skin cancer:

Beta carotene

Studies of beta carotene (taken as a supplement in pills) have not shown that it prevents nonmelanoma skin cancer from forming or coming back.

Isotretinoin and related retinoids

Retinoids are Vitamin A or vitamin A-like compounds that are applied to the skin or taken by mouth. Isotretinoin is a type of retinoid being studied in the prevention and treatment of certain cancers.

High doses of isotretinoin taken by mouth have been shown to prevent new skin cancers in patients with xeroderma pigmentosum. Isotretinoin cream has not been shown to prevent nonmelanoma skin cancers from coming back in patients previously treated for nonmelanoma skin cancers. These treatments can cause serious side effects.

Selenium

Studies have shown that selenium (taken in brewer's yeast tablets) does not lower the risk of basal cell carcinoma, and may increase the risk of squamous cell carcinoma.

Celecoxib

A study of celecoxib, a nonsteroidal anti-inflammatory drug (NSAID), in patients with actinic keratosis and a history of nonmelanoma skin cancer found those who took celecoxib had slightly lower rates of recurrent nonmelanoma skin cancers. Celecoxib may cause serious heart and blood vessel side effects.

Alpha-difluoromethylornithine (DFMO)

A study of alpha-difluoromethylornithine (DFMO) in patients with a history of nonmelanoma skin cancer showed that those who took DFMO had lower rates of basal cell carcinomas than those who took a placebo, but no difference in squamous cell carcinoma rates. However, those who took DFMO had greater hearing loss than the placebo group, leading to a higher rate of patients discontinuing this drug.

Nicotinamide (vitamin B3)

Studies have shown that nicotinamide (vitamin B3) helps prevent new actinic keratoses lesions from forming in people who had four or fewer actinic lesions before taking nicotinamide. However, one study also showed an increased incidence of nonmelanoma skin cancers in patients months after they were treated with nicotinamide. More studies are needed to find out if nicotinamide prevents nonmelanoma skin cancer from forming or coming back.

### It is not known if the following lower the risk of melanoma:

#### Sunscreen

It has not been proven that using sunscreen to prevent sunburn can protect against melanoma caused by UV radiation. Other risk factors such as having skin that burns easily, having many benign (noncancerous) moles, or having atypical nevi may also play a role in whether melanoma forms.

#### Counseling and protecting the skin from the sun

Studies show that people who receive counseling or information about avoiding sun exposure improve their sun protective habits. These studies show mixed effects on reducing sunburns and do not show whether skin cancers are reduced.

Harms of avoiding sun exposure may include mood disorders, sleep disturbances, higher blood pressure, and impaired vitamin D metabolism..

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials are conducted with healthy people who have not had cancer but who have an increased risk for cancer. Other prevention trials are conducted with people who have had cancer and are trying to prevent another cancer of the same type or to lower their chance of developing a new type of cancer. Other trials are done with healthy volunteers who are not known to have any risk factors for cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent skin cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about skin cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Skin Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/patient/skin-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389434]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).